# Rhabdoid Tumor Predisposition Syndrome Type 2 (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics, cancer risks, and management of rhabdoid tumor predisposition syndrome type 2. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines for recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board and PDQ Cancer Genetics Editorial Board, which are editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Introduction

Rhabdoid tumor predisposition syndrome type 2 (RTPS2) is caused by germline (or hereditary) loss-of-function pathogenic variants in the SMARCA4 gene, which is located on chromosome 19p13.[1] RTPS2 is an autosomal dominant disorder. Individuals with SMARCA4 pathogenic variants have an increased risk to develop small cell carcinoma of the ovary hypercalcemic type (SCCOHT) and, rarely, atypical teratoid/rhabdoid tumors (AT/RT). The risk of developing extracranial rhabdoid tumors and other rare tumors is currently unknown. Germline SMARCA4 pathogenic or likely pathogenic variants have been identified in individuals with neuroblastoma, suggesting that SMARCA4 could also be a neuroblastoma susceptibility gene.[2]

### References

Nemes K, Bens S, Bourdeaut F, et al.: Rhabdoid Tumor Predisposition Syndrome. In: Adam MP, Feldman J, Mirzaa GM, et al., eds.: GeneReviews. University of Washington, Seattle, 1993-2024, pp. Available online (https://www.ncbi.nlm.nih.gov/books/NBK469816/). Last accessed February 25, 2025.
Witkowski L, Nichols KE, Jongmans M, et al.: Germline pathogenic SMARCA4 variants in neuroblastoma. J Med Genet 60 (10): 987-992, 2023.36813544

## Nomenclature for Rhabdoid Tumor Predisposition Syndrome Type 2

Individuals who harbor germline SMARCA4 pathogenic variants have rhabdoid tumor predisposition syndrome type 2 (RTPS2).[1] Nomenclature for genetic disorders continues to evolve. Future terminology for these disorders may reflect the proposed dyadic naming approach, incorporating gene and phenotype.[2]

### References

Samples, Phenotypes and Ontologies Team: Rhabdoid Tumor Predisposition Syndrome 2. Ontology Lookup Service European Molecular Biology Laboratory-European Bioinformatics Institute (EMBL-EBI), 2023. Available online (http://purl.obolibrary.org/obo/MONDO_0013224). Last accessed October 17, 2023.
Biesecker LG, Adam MP, Alkuraya FS, et al.: A dyadic approach to the delineation of diagnostic entities in clinical genomics. Am J Hum Genet 108 (1): 8-15, 2021.33417889

## Genetics of Rhabdoid Tumor Predisposition Syndrome Type 2

### Molecular Genetics of Rhabdoid Tumor Predisposition Syndrome Type 2 (RTPS2)

The SMARCA4 gene encodes the SMARCA4 protein (also called BRG1), a member of the SWI/SNF chromatin remodeling complex, which helps control gene transcription. Individuals with deleterious germline SMARCA4 variants (typically loss-of-function variants) are diagnosed with RTPS2. In RTPS2, tumor development follows the Knudson two-hit hypothesis, in which tumors are driven by the inactivation of both copies of the SMARCA4 gene. Inactivation of SMARCA4 nearly always results in loss of SMARCA4/BRG1 protein expression. Rare cases of small cell carcinoma of the ovary hypercalcemic type (SCCOHT) have been described with retained SMARCA4 immunoreactivity, despite the presence of SMARCA4 pathogenic variants or loss of heterozygosity detected via molecular testing.[1]

While most hereditary non-SCCOHT rhabdoid tumor cases are caused by SMARCB1 pathogenic variants and lead to rhabdoid tumor predisposition syndrome type 1 (RTPS1), approximately 2% to 3% of rhabdoid tumor cases are caused by SMARCA4 pathogenic variants.[2] Intracranial atypical teratoid/rhabdoid tumors (AT/RTs) are seen more often than extracranial rhabdoid tumors in people with RTPS2.[3] Data are scarce, given the rarity of SMARCA4-associated AT/RTs. However, it has been suggested that the rate of germline cases is higher in SMARCA4-associated AT/RTs than in those with loss of SMARCB1.[4] Germline SMARCA4 pathogenic variants associated with RTPS2 lead to a loss of function, most often via nonsense variants and intragenic deletions.

On the other hand, germline SMARCA4 pathogenic variants are detected in approximately 40% of women with SCCOHT, a rare and aggressive tumor. Somatic variation in these tumors is typically caused by nonsense or frameshift variants. However, loss of the short arm of chromosome 19 and missense variants have also been seen.[5,6] Some investigators have suggested that SCCOHT be called malignant rhabdoid tumor of the ovary (MRTO) and be included in the group of RTPS2-associated tumors.[3]

### Inheritance of RTPS2

RTPS2 is an autosomal dominant cancer predisposition disorder. The penetrance of RTPS2 appears to be incomplete. Studies using population-scale genomic ascertainment have not been conducted. Data suggest that SMARCA4 variants in RTPS2 are inherited more often than SMARCB1 variants in RTPS1. In a small cohort study, six of seven patients inherited SMARCA4 pathogenic variants from an unaffected parent.[4] It is recommended that family members of SMARCA4 carriers consider genetic testing. Testing is also recommended for affected patients.[7]

### Related Conditions

Germline SMARCA4 variants have also been identified in individuals with Coffin-Siris syndrome (CSS).[8] However, unlike loss-of-function SMARCA4 variants in RTPS2, individuals with CSS typically have nontruncating missense SMARCA4 variants. In a patient with a germline nonsense SMARCA4 variant, a mild CSS presentation and a SCCOHT diagnosis were described.[8] However, individuals with CSS who carry nontruncating SMARCA4 variants are not at risk of developing rhabdoid tumors.

### References

Mazibrada J, Jayatunge N, Domecq C, et al.: Unusual Aspects of Small Cell Carcinoma of the Ovary of Hypercalcaemic Type: Retained SMARCA4 Immunohistochemical Staining and Positive Staining With TLE1. Am J Surg Pathol 47 (11): 1261-1266, 2023.37345679
Del Baldo G, Carta R, Alessi I, et al.: Rhabdoid Tumor Predisposition Syndrome: From Clinical Suspicion to General Management. Front Oncol 11: 586288, 2021.33692948
Foulkes WD, Clarke BA, Hasselblatt M, et al.: No small surprise - small cell carcinoma of the ovary, hypercalcaemic type, is a malignant rhabdoid tumour. J Pathol 233 (3): 209-14, 2014.24752781
Hasselblatt M, Nagel I, Oyen F, et al.: SMARCA4-mutated atypical teratoid/rhabdoid tumors are associated with inherited germline alterations and poor prognosis. Acta Neuropathol 128 (3): 453-6, 2014.25060813
Witkowski L, Goudie C, Foulkes WD, et al.: Small-Cell Carcinoma of the Ovary of Hypercalcemic Type (Malignant Rhabdoid Tumor of the Ovary): A Review with Recent Developments on Pathogenesis. Surg Pathol Clin 9 (2): 215-26, 2016.27241105
Weyandt JD, Young C, Carraway C, et al.: Small-cell carcinoma of the ovary, hypercalcemic type (SCCOHT) has approximately 20-30% penetrance in individuals carrying loss-of-function mutations in SMARCA4. [Abstract] Fam Cancer 22: A-P063, 373, 2023. Also available online (https://link.springer.com/article/10.1007/s10689-023-00332-5#Sec211). Last accessed January 28, 2025.
Foulkes WD, Kamihara J, Evans DGR, et al.: Cancer Surveillance in Gorlin Syndrome and Rhabdoid Tumor Predisposition Syndrome. Clin Cancer Res 23 (12): e62-e67, 2017.28620006
Errichiello E, Mustafa N, Vetro A, et al.: SMARCA4 inactivating mutations cause concomitant Coffin-Siris syndrome, microphthalmia and small-cell carcinoma of the ovary hypercalcaemic type. J Pathol 243 (1): 9-15, 2017.28608987

## Cancer Risks, Spectrum, and Characteristics of Rhabdoid Tumor Predisposition Syndrome Type 2

Up to 40% of females with small cell carcinoma of the ovary hypercalcemic type (SCCOHT) harbor germline SMARCA4 pathogenic variants.[1,2] Multiple family members can be affected.[3] In women with SCCOHT who did not have germline SMARCA4 pathogenic variants, one somatic SMARCA4 variant was almost always found.[2] A retrospective review of 48 SCCOHT tumors sequenced at a diagnostic lab found 18 tumors (37.5%) with germline SMARCA4 pathogenic variants. The remainder were somatic SMARCA4 variants, indeterminate, or unknown. The ages of the 48 women ranged from 8 years to 56 years (median age, 28.5 y).[4] A retrospective review of the Slovenian Cancer Registry identified seven SCCOHT cases from 1991 to 2021 in a country with about 2 million people, giving a minimal SCCOHT incidence of 0.12 cases per 1 million people per year. Of the seven cases, four harbored germline loss-of-function SMARCA4 pathogenic variants. Three tumors harbored somatic SMARCA4 loss-of-function variants. Six of the seven women died of SCCOHT within 27 months of their diagnoses.[5] Ages of people diagnosed with SCCOHT ranged from infancy to 56 years, with an average age of 23.9 years. Penetrance was uncertain but may be considerable. There are known unpublished and published cases of women in their 50s (and older) with germline SMARCA4 pathogenic variants who remain cancer free.[2]

Inactivating SMARCA4 variants have been reported in a rare, aggressive form of uterine sarcoma seen in young women, called SMARCA4-deficient undifferentiated uterine sarcoma (SMARCA4-DUS), also known as a malignant rhabdoid tumor of the uterus.[6,7] A retrospective review of 17 SMARCA4-DUS tumors sequenced at a diagnostic lab found two tumors (11.8%) with germline SMARCA4 pathogenic variants. The remainder were somatic SMARCA4 variants, indeterminate, or unknown. The ages of the two women were 40 years and 55 years.[4]

Germline SMARCA4 pathogenic variants are rarely found in individuals with atypical teratoid/rhabdoid tumors (AT/RTs). SMARCA4-altered AT/RTs may be associated with worse prognoses.[8] Risk of other rhabdoid tumors is unknown but likely low.[9] At least one case report described an unusual lung cancer in a child with a SMARCA4 pathogenic variant.[10]

Clinically aggressive SMARCA4-deficient thoracic sarcomas (SMARCA4-DTS) have been described in adults (typically male smokers), but germline SMARCA4 variants have not been reported.[11-14]

Heterozygous germline SMARCA4 pathogenic variants were reported in 11 individuals with neuroblastoma (eight previously reported cases and four new cases). Nine of these individuals were male. The median age of diagnosis was 5 years (range, 2 mo–26 y), and all but one patient presented in the pediatric age range. Of the 11 patients, one child aged 4 years presented with bilateral neuroblastoma. This child also had a germline CHEK2 pathogenic variant. Eight of nine SMARCA4 variants were expected to result in a loss-of-function variant. The remaining four SMARCA4 variants were missense. There was no clear difference in age of diagnosis between individuals with missense and loss-of-function variants. In the four patients who had MYCN status tested, none showed MYCN amplification. None of the 11 individuals were known to have family histories of SMARCA4-related tumors. In eight cases where somatic testing was performed, loss of heterozygosity was observed, which provides additional support that SMARCA4 is a tumor suppressor.[15]

### References

Foulkes WD, Clarke BA, Hasselblatt M, et al.: No small surprise - small cell carcinoma of the ovary, hypercalcaemic type, is a malignant rhabdoid tumour. J Pathol 233 (3): 209-14, 2014.24752781
Tischkowitz M, Huang S, Banerjee S, et al.: Small-Cell Carcinoma of the Ovary, Hypercalcemic Type-Genetics, New Treatment Targets, and Current Management Guidelines. Clin Cancer Res 26 (15): 3908-3917, 2020.32156746
Witkowski L, Donini N, Byler-Dann R, et al.: The hereditary nature of small cell carcinoma of the ovary, hypercalcemic type: two new familial cases. Fam Cancer 16 (3): 395-399, 2017.27866340
Connor YD, Miao D, Lin DI, et al.: Germline mutations of SMARCA4 in small cell carcinoma of the ovary, hypercalcemic type and in SMARCA4-deficient undifferentiated uterine sarcoma: Clinical features of a single family and comparison of large cohorts. Gynecol Oncol 157 (1): 106-114, 2020.31954538
Blatnik A, Dragoš VŠ, Blatnik O, et al.: A Population-Based Study of Patients With Small Cell Carcinoma of the Ovary, Hypercalcemic Type, Encompassing a 30-Year Period. Arch Pathol Lab Med 148 (3): 299-309, 2024.37270804
Kolin DL, Dong F, Baltay M, et al.: SMARCA4-deficient undifferentiated uterine sarcoma (malignant rhabdoid tumor of the uterus): a clinicopathologic entity distinct from undifferentiated carcinoma. Mod Pathol 31 (9): 1442-1456, 2018.29700418
Lin DI, Allen JM, Hecht JL, et al.: SMARCA4 inactivation defines a subset of undifferentiated uterine sarcomas with rhabdoid and small cell features and germline mutation association. Mod Pathol 32 (11): 1675-1687, 2019.31190001
Hasselblatt M, Nagel I, Oyen F, et al.: SMARCA4-mutated atypical teratoid/rhabdoid tumors are associated with inherited germline alterations and poor prognosis. Acta Neuropathol 128 (3): 453-6, 2014.25060813
Del Baldo G, Carta R, Alessi I, et al.: Rhabdoid Tumor Predisposition Syndrome: From Clinical Suspicion to General Management. Front Oncol 11: 586288, 2021.33692948
de Kock L, Fahiminiya S, Fiset PO, et al.: Infantile Pulmonary Teratoid Tumor. N Engl J Med 378 (23): 2238-2240, 2018.29874541
Le Loarer F, Watson S, Pierron G, et al.: SMARCA4 inactivation defines a group of undifferentiated thoracic malignancies transcriptionally related to BAF-deficient sarcomas. Nat Genet 47 (10): 1200-5, 2015.26343384
Perret R, Chalabreysse L, Watson S, et al.: SMARCA4-deficient Thoracic Sarcomas: Clinicopathologic Study of 30 Cases With an Emphasis on Their Nosology and Differential Diagnoses. Am J Surg Pathol 43 (4): 455-465, 2019.30451731
Yoshida A, Kobayashi E, Kubo T, et al.: Clinicopathological and molecular characterization of SMARCA4-deficient thoracic sarcomas with comparison to potentially related entities. Mod Pathol 30 (6): 797-809, 2017.28256572
Sauter JL, Graham RP, Larsen BT, et al.: SMARCA4-deficient thoracic sarcoma: a distinctive clinicopathological entity with undifferentiated rhabdoid morphology and aggressive behavior. Mod Pathol 30 (10): 1422-1432, 2017.28643792
Witkowski L, Nichols KE, Jongmans M, et al.: Germline pathogenic SMARCA4 variants in neuroblastoma. J Med Genet 60 (10): 987-992, 2023.36813544

## Management of Rhabdoid Tumor Predisposition Syndrome Type 2

### Genetic Counseling of Rhabdoid Tumor Predisposition Syndrome Type 2 (RTPS2)

It is recommended that any female with (1) a personal diagnosis or family history of small cell carcinoma of the ovary hypercalcemic type (SCCOHT) or (2) a personal diagnosis or family history of other rhabdoid tumors receive genetic counseling and be offered SMARCA4 genetic testing. Related boys younger than 5 years are recommended to undergo rhabdoid tumor screening and SMARCA4 cascade genetic testing. It is also appropriate to offer SMARCA4 genetic testing to unaffected males older than 5 years who have family histories of rhabdoid tumors or SCCOHT in female family members. These men may be obligate carriers, and screening recommendations would apply to their children.[1] Shared decision making can be considered (regarding the timing of genetic testing) for boys between the ages of 5 and 18 years, since screening recommendations do not exist for boys older than 5 years. Clinicians must respect the individual's right to choose germline genetic testing.

### Surveillance of RTPS2

In 2017, experts in childhood cancer genetics created the first recommendations for cancer surveillance in rhabdoid tumor predisposition syndromes. These recommendations were updated in 2024.[2,3]

Optimal surveillance recommendations for children with RTPS2 have not been established and may be burdensome for many families. For boys and girls younger than 5 years, surveillance of the craniospinal axis is recommended every 4 to 6 weeks from birth to 6 months, then every 3 months until age 5 years, after which surveillance ceases. Clinical examination and abdominal ultrasound are conducted every 3 months until the age of 5 years, when abdominal surveillance stops for boys. For girls, abdominal and pelvic ultrasounds are recommended every 6 months, with no age limit. Abdominal/pelvic ultrasound is a limited surveillance strategy for detecting low-stage SCCOHT that is amenable to curative surgical resection. This surveillance technique has not been validated in patients with SMARCA4 pathogenic variants.[3,4] Alternative recommendations have been made for risk-reducing bilateral salpingo-oophorectomy in first-degree relatives of women diagnosed with SCCOHT. However, timing of such surgeries in girls and young women is challenging to determine.[5-7] Case reports indicated that when young women or girls were affected by SCCOHT, there was a greater impetus for risk-reducing salpingo-oophorectomy, particularly in siblings.[7,8]

### Surveillance in Survivorship of RTPS2

For women and girls with SCCOHT, the overall survival rate is approximately 51% for patients with Fédération Internationale de Gynécologie et d’Obstétrique (FIGO) stage I disease and decreases to 24% for patients with stage II to stage IV disease.[9] Since treatment for SCCOHT is surgical removal of the ovary, it is recommended that female patients with germline SMARCA4 pathogenic variants have all ovarian tissue removed (removal of both ovaries plus any localized/metastatic disease, like omental studding) and receive adjuvant chemotherapy.[10] Surveillance imaging would therefore default to long-term follow-up guidelines for survivors of ovarian cancer, as outlined by the National Comprehensive Cancer Network.[11]

For children younger than 5 years who have been diagnosed with atypical teratoid/rhabdoid tumor or malignant rhabdoid tumor, surveillance of unaffected organs can be continued during primary cancer treatment and posttherapy surveillance.[3]

### Rhabdoid Tumor Predisposition and Fertility Preservation

RTPS2 presents unique challenges for fertility preservation in women or girls affected by SCCOHT. Prophylactic risk-reducing bilateral salpingo-oophorectomy is recommended for individuals with a high risk of developing SCCOHT. Women or girls with RTPS2 may engage with their institutional fertility preservation program to determine eligibility for egg or ovarian tissue banking. However, published data suggest that the cell of origin for SCCOHT may be a germ cell, raising uncertainty about this approach.[12] Genetic counseling and consideration of preimplantation genetic testing of embryos is advisable.

### References

Connor YD, Miao D, Lin DI, et al.: Germline mutations of SMARCA4 in small cell carcinoma of the ovary, hypercalcemic type and in SMARCA4-deficient undifferentiated uterine sarcoma: Clinical features of a single family and comparison of large cohorts. Gynecol Oncol 157 (1): 106-114, 2020.31954538
Foulkes WD, Kamihara J, Evans DGR, et al.: Cancer Surveillance in Gorlin Syndrome and Rhabdoid Tumor Predisposition Syndrome. Clin Cancer Res 23 (12): e62-e67, 2017.28620006
Hansford JR, Das A, McGee RB, et al.: Update on Cancer Predisposition Syndromes and Surveillance Guidelines for Childhood Brain Tumors. Clin Cancer Res 30 (11): 2342-2350, 2024.38573059
Frühwald MC, Nemes K, Boztug H, et al.: Current recommendations for clinical surveillance and genetic testing in rhabdoid tumor predisposition: a report from the SIOPE Host Genome Working Group. Fam Cancer 20 (4): 305-316, 2021.33532948
Pastorczak A, Krajewska K, Urbanska Z, et al.: Ovarian carcinoma in children with constitutional mutation of SMARCA4: single-family report and literature review. Fam Cancer 20 (4): 355-362, 2021.33907931
Podwika SE, Jenkins TM, Khokhar JK, et al.: Optimal age for genetic cancer predisposition testing in hereditary SMARCA4 Ovarian Cancer Families: How young is too young? Gynecol Oncol Rep 32: 100569, 2020.32382648
Vu JA, Thompson WS, Klinkner DB, et al.: Risk reduction for small cell cancer of the ovary, hypercalcemic type in prepubertal patient: A clinical and bioethical perspective. Gynecol Oncol Rep 49: 101261, 2023.37663174
Pejovic T, McCluggage WG, Krieg AJ, et al.: The dilemma of early preventive oophorectomy in familial small cell carcinoma of the ovary of hypercalcemic type. Gynecol Oncol Rep 28: 47-49, 2019.30886884
Wens FSPL, Hulsker CCC, Fiocco M, et al.: Small Cell Carcinoma of the Ovary, Hypercalcemic Type (SCCOHT): Patient Characteristics, Treatment, and Outcome-A Systematic Review. Cancers (Basel) 15 (15): , 2023.37568608
Pressey JG, Dandoy CE, Pater LE, et al.: Small cell carcinoma of the ovary hypercalcemic type (SCCOHT): Comprehensive management of a newly diagnosed young adult. Gynecol Oncol 158 (3): 538-546, 2020.32654763
National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Ovarian Cancer Including Fallopian Tube Cancer and Primary Peritoneal Cancer. Version 3.2024. Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2024. Available online with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/ovarian.pdf) Last accessed January 27, 2025.
McCluggage WG, Witkowski L, Clarke BA, et al.: Clinical, morphological and immunohistochemical evidence that small-cell carcinoma of the ovary of hypercalcaemic type (SCCOHT) may be a primitive germ-cell neoplasm. Histopathology 70 (7): 1147-1154, 2017.28130795

## Latest Updates to This Summary (03/03/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

This is a new summary.

This summary is written and maintained by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics) and the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics, cancer risks, and management of rhabdoid tumor predisposition syndrome type 2. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics) and the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which are editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Rhabdoid Tumor Predisposition Syndrome Type 2 are:

- Julia Meade, MD (UPMC Children's Hospital of Pittsburgh)
- Sarah Scollon, MS, CGC (Baylor College of Medicine & Texas Children's Hospital)
- Douglas Stewart, MD (National Cancer Institute)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Cancer Genetics Editorial Board and the PDQ Pediatric Treatment Editorial Board use a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Cancer Genetics Editorial Board and PDQ® Pediatric Treatment Editorial Board. PDQ Rhabdoid Tumor Predisposition Syndrome Type 2. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/publications/pdq/information-summaries/genetics/rtps2-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 40203164]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).